# Gastrointestinal Complications

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of gastrointestinal complications, including constipation, impaction, bowel obstruction, diarrhea, and radiation enteritis. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## What is constipation?

Constipation is the slow movement of stool (poop) through the large intestine. The longer it takes for the stool to move through the large intestine, the more it loses fluid and the drier and harder it becomes.

If you are constipated, you may be unable to have a bowel movement, need to push harder to have a bowel movement, or have fewer than your usual number of bowel movements. Talk to your doctor if you have constipation. Your doctor can recommend medicines and other ways for treating constipation caused by cancer and cancer treatment.

Constipation may last for a short time, or it may be chronic and last for a long time. Long-term (chronic) constipation can lead to fecal impaction or bowel obstruction, two potentially life-threatening conditions that require immediate medical care. Learn more at What is fecal impaction? (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation#what-is-fecal-impaction) and Bowel Obstruction (https://www.cancer.gov/about-cancer/treatment/side-effects/bowel-obstruction).

### What are signs and symptoms of constipation?

Signs and symptoms of constipation include:

- having two or fewer bowel movements in one week
- dry, hard, or lumpy stool
- pain during a bowel movement
- difficulty having a bowel movement
- stomach pain or cramps
- feeling bloated or nauseous

### What causes constipation in people with cancer?

Constipation in people with cancer may be caused by:

- Certain types of cancer. Constipation may be a sign or symptom of cancers that push on organs in the abdomen, block the movement of stool through the bowel, or affect the nerves in your spine connected to your bowel. Some cancers that may cause constipation include colon cancer, rectal cancer, ovarian cancer, and brain tumors.
- Cancer treatments such as chemotherapy. Constipation is a common side effect of some types of chemotherapy.
- Medicines. Many medicines, including opioid pain medications, antianxiety drugs, antinausea drugs (antiemetics), and diuretics, can cause constipation.
- Lifestyle and dietary changes. When you are getting cancer treatment, you may have less energy for exercise and your appetite and diet may change. Being less active and eating different foods than normal can cause constipation.

### How is constipation diagnosed in people with cancer?

Finding the cause of constipation is important so you can get relief and avoid serious problems such as fecal impaction. Your doctor will do a physical exam, which will include looking at and feeling the abdomen for areas of swelling or firmness and listening to the sounds of your bowels. Your doctor may also ask questions such as:

- How often do you have a bowel movement? How often did you have a bowel movement before you had cancer? Has there been a recent change in your bowel habits?
- When was your last bowel movement? What was it like (how much, hard or soft, what color, was there blood)? Did you have to push more than usual?
- Do you have a fever, cramps, a feeling of fullness near the rectum, pain, or bloating?

Your doctor may be able to diagnose constipation and suggest treatment based on a physical exam and these questions. Sometimes, your doctor may need to do other tests to better understand what is causing constipation:

- Digital rectal examination (DRE): A physical exam in which the doctor or nurse inserts a lubricated, gloved finger into the lower part of the rectum to feel for impacted stool or unusual changes.
- X-rays: An x-ray is a type of radiation that, in low doses, can be used to make a picture of areas inside the body. An x-ray of the abdomen can show a tumor or fecal impaction that may be causing constipation.

### Ways to prevent and treat constipation

If your doctor thinks your cancer or cancer treatments will cause constipation, they will give you tips and prescribe medicine to prevent it. If you become constipated, your doctor will recommend many of these same tips and medicines to help you get relief. Talk with your health care team about what treatment is right for you.

#### Tips for managing constipation

- Drink plenty of liquids. Drinking 8 cups of water or clear liquids (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/clear-liquids) per day can help you stay hydrated, which helps with constipation. Beverages such as coffee and prune juice can have a laxative effect, and hot drinks can also help stool move through the bowel.
- Try to be active every day. Ask your health care team about exercises you can do. Walking, riding a bike, and practicing yoga may be options for you. You can also do light exercise in a bed or chair.
- Eat at the same time each day. This routine can help you get back to your normal number of bowel movements.
- Keep a record of your bowel movements. Showing this record to your health care team and talking to them about what is normal for you can help your doctor treat the constipation you are experiencing.
- Talk with your doctor about dietary fiber. High-fiber foods and fiber supplements can make constipation worse for some people. Ask your doctor if adding fiber to your diet will help relieve constipation for you.

#### What can people with cancer take for constipation?

Your doctor may prescribe medicines called laxatives that help prevent or relieve constipation. Use only medicines and treatments for constipation that your doctor recommends. Many different types of laxatives are available, and your doctor may recommend others not listed here:

- Osmotics pull water into the bowel from other parts of the body, making it easier to have a bowel movement. Polyethylene glycol (MiraLAX), magnesium hydroxide (Milk of Magnesia), lactulose (Enulose), and sorbitol are examples of osmotic laxatives.
- Stool softeners, or emollients, soften poop by increasing the amount of water and fat that the poop absorbs. Docusate (Colace) is an example of a stool softener.
- Stimulant laxatives cause the intestines to contract so stool moves through the bowel. Bisacodyl (Correctol), senna (Senokot), and castor oil are examples of stimulant laxatives.

Do not use suppositories (capsules you insert into your anus) or enemas (liquid medicine that you inject into your anus) unless your doctor recommends them. In some people with cancer, these treatments may lead to bleeding, infection, or other harmful side effects.

#### How a caregiver can help

- Encourage the person you are caring for to drink plenty of water or other fluids. Make sure they also have access to hot beverages and prune juice, which may help relieve constipation.
- Help the person you are caring for stay physically active. Physical activity includes moving from a bed to a chair, walking short distances, or riding an exercise bike. Talk to their care team to find out what exercise is right for them.
- Monitor the person’s bowel movements and help them keep a record of their bowel movements. They should have a bowel movement every day or every other day that is not hard and does not require straining.
- Notify the care team if the person has had fewer than three bowel movements in one week or is experiencing severe abdominal pain, vomiting, and other signs of fecal impaction.

### What is fecal impaction?

Fecal impaction is a serious condition in which hardened stool blocks the colon or rectum. Unlike constipation, fecal impaction can be life-threatening and requires immediate medical attention.

Long-term constipation can lead to fecal impaction, a potentially life-threatening condition in which hardened stool blocks the flow of waste through the colon or rectum. Fecal impaction requires immediate medical attention.

Fecal impaction; drawing showing a mass of dark brown stool in the last part of the colon and in the rectum. The stomach, small intestine, and anus are also shown.

#### What causes fecal impaction?

Causes of fecal impaction include:

- opioid pain medicines
- little or no physical activity over a long period
- dietary changes
- constipation that is not treated
- inability to push stool out because of weakness or muscle problems

#### What are signs and symptoms of fecal impaction?

Signs and symptoms of fecal impaction include:

- chronic constipation
- a feeling of pressure in the rectum or incomplete emptying of stool
- lower back pain or pain in the abdomen
- urinating more or less often than usual or being unable to urinate
- breathing problems, rapid heartbeat, confusion, dizziness, low blood pressure, and bloating
- sudden, explosive diarrhea or leaking stool (as stool moves around the impaction)
- nausea and vomiting
- dehydration

#### How is fecal impaction diagnosed in people with cancer?

Fecal impaction is diagnosed in the same way as constipation. To learn more, go to How is constipation diagnosed in people with cancer? (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation#how-is-constipation-diagnosed-in-people-with-cancer)

#### How is fecal impaction treated?

The main treatment for fecal impaction is to moisten and soften the stool using an enema. The softened stool can then pass out of the body. Because enemas can be dangerous for people with cancer, they should be used only when prescribed and given by a doctor.

You may need to have stool manually removed from the rectum after it is softened. Laxatives are generally not used to treat fecal impaction because they may cause cramping and damage to your intestines.

### Talking with your doctor about constipation

Tell your doctor or nurse if you are having constipation so you can get treatment as soon as possible. Treating constipation early can help prevent serious problems like fecal impaction and bowel obstruction. Your doctor can help you find ways to treat and manage this side effect of cancer and cancer treatment.

Questions to ask your provider about constipation:

- What symptoms or problems should I call you about?
- Should I take medicine for constipation? If so, what medicine should I take? What medicine should I avoid?
- How much liquid should I drink each day?
- What foods can help with constipation? What foods should I avoid?
- Could I meet with a registered dietitian to learn more?

### Getting support if you have constipation

Side effects like constipation or fecal impaction can be hard to deal with, both physically and emotionally. It’s important to ask for support from your health care team. They can help you prepare for and make it through difficult times. Learn more about ways to cope with cancer (https://www.cancer.gov/about-cancer/coping), including ways to adjust to daily life during cancer treatment (https://www.cancer.gov/about-cancer/coping/day-to-day).

For family members and friends who are caring for someone with cancer, you may find these suggestions for caregivers (https://www.cancer.gov/about-cancer/coping/caregiver-support) to be helpful.

### Related Resources

- Gastrointestinal Complications (PDQ®)–Health Professional Version (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation/gi-complications-hp-pdq)

## What is bowel obstruction?

A bowel (intestinal) obstruction is a serious condition that occurs when the small or large intestine becomes blocked. The blockage stops food and stool (poop) from moving through the intestines. The intestine may be partly or completely blocked and can sometimes be blocked in two places. Bowel obstructions can be life-threatening and require immediate medical attention.

A bowel obstruction may occur soon after cancer treatment ends or many months or years later. Bowel obstruction is most common in people with advanced cancer.

### What causes bowel obstruction in people with cancer?

Bowel obstruction in people with cancer may be caused by:

- Cancer treatment. Some types of cancer treatment can cause bowel obstruction:
  - Surgery on the abdomen or pelvis may lead to scar tissue, also called adhesions, that form after surgery. Adhesions can cause the intestines to bind together, creating a blockage.
  - Radiation therapy directed at the abdomen can damage the intestines, leading to scar tissue, inflammation, radiation enteritis, and irritation that can block the bowel.
- Cancer itself. Cancers that form in the abdomen, such as colon, ovarian, pancreatic, or stomach cancer, are more likely than other cancer types to cause a bowel obstruction. A bowel obstruction caused by cancer itself is called a malignant bowel obstruction. Cancer can cause a bowel obstruction in different ways:
  - A tumor that forms in or presses on the bowels can cause a bowel obstruction. A tumor can also cause a bowel obstruction if it grows in an area that affects the nerves that control the movement of food through the intestines.
  - Advanced cancer can cause a bowel obstruction when cancer spreads to the bowels from another place in the body. Advanced cancer is the most common cause of malignant bowel obstruction.
  A malignant bowel obstruction happens when a tumor forms in the intestines and blocks the flow of waste. The tumor may be from colon or rectal cancer or from cancer that has spread to the intestines from another part of the body.
  Drawing showing a large mass of dark brown stool in the large intestine caused by a tumor blockage. The tumor is at the end of the large intestine just before the rectum. Also shown are other parts of the digestive tract, including the stomach, small intestine, rectum, and anus.

Other causes of bowel obstruction not related to cancer or cancer treatment include a twist in the intestine, a hernia, irritable (inflammatory) bowel syndrome, diverticulitis, some medicines, long-term constipation, and other conditions.

### What are the signs and symptoms of bowel obstruction?

Signs and symptoms of a bowel obstruction include:

- abdominal pain or cramps
- swelling in the abdomen
- constipation
- diarrhea
- nausea or vomiting
- problems passing gas
- loss of appetite

When an obstruction starts, the intestines may be partly blocked, causing a few mild symptoms. As the obstruction gets worse, your symptoms may happen more often and become more severe. You may have frequent vomiting, extreme bloating, and intense abdominal pain. These are signs of a complete obstruction, in which stool and gas are mostly or totally blocked from leaving the body.

### How is bowel obstruction diagnosed?

Finding the cause of a bowel obstruction and the place where the intestine is blocked is important so your doctor can recommend treatment. Your doctor will ask about your symptoms and do a physical exam. They may also use the following tests and procedures to diagnose a bowel obstruction and suggest treatment options:

- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This scan helps doctors find the cause and exact location of the obstruction. It is also called computed tomography, computerized tomography, or computerized axial tomography.
- Abdominal x-ray is an x-ray of the organs inside the abdomen. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body. It can also show the location of the obstruction, but it is not as sensitive as a CT scan.
- Blood tests, such as a complete blood count and electrolyte panel, show if you are dehydrated or have an electrolyte imbalance or infection. These problems may be caused by a bowel obstruction.
- Urinalysis checks the color of urine and its contents, such as sugar, protein, red blood cells, and white blood cells. A urinalysis shows your fluid levels, signs of infection, and other problems that may be caused by a bowel obstruction.

### Treating a bowel obstruction

If you have a bowel obstruction, you will need to be treated in a hospital. Treatment for a bowel obstruction depends on what caused the blockage and whether the intestines are partly or completely blocked. If you have a complete blockage, you will probably need surgery. Partial obstructions may clear up with nonsurgical treatments.

Treatment for a bowel obstruction may include:

- Bowel rest. This is when you avoid eating and drinking to keep the obstruction from getting worse. Bowel rest or a liquid diet (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/full-liquid-foods) that is easy on your intestines can help your body clear the blockage. You may also receive fluid replacement therapy (IV fluids) to help the fluids and electrolytes in your body return to normal.
- Nasogastric tube. This tube is inserted through the nose and esophagus into the stomach to relieve pressure caused by a bowel obstruction by removing fluid and gas from the digestive system. A nasogastric tube helps control nausea, vomiting, and pain related to the obstruction and may help your body clear the blockage.
- Stent. This is a tube placed in the intestine to open the blocked area. Stents relieve bowel obstruction symptoms by temporarily opening the bowels to let food, waste, and gas pass through the body. Stents are most often used to treat bowel obstructions caused by cancer, but they may also be used for obstructions with other causes.
- Surgery. If a bowel obstruction does not go away with other treatments or if you have a complete blockage, you may need surgery to remove the obstruction. For an obstruction caused by cancer, surgery will include removing the tumor that is causing the blockage. Your doctor will talk with you about your overall health and potential risks and benefits of surgery to help you decide if surgery is right for you.
- Gastrostomy tube. A tube that helps release fluid and air from the stomach to relieve symptoms caused by the obstruction. A tube is inserted through the wall of the abdomen directly into the stomach. The gastrostomy tube can be attached to a drainage bag with a valve. When the valve is open, fluid and air can leave the stomach. Gastrostomy tubes are most often used to treat bowel obstructions caused by cancer.
- Antibiotics. Sometimes a bowel obstruction causes a tear in the intestines that lets fluids leak into the abdomen. These fluids can cause your body to have an extreme immune response to an infection (sepsis). Antibiotics can help prevent tissue damage, organ failure, or death from sepsis.
- Antinausea and pain medicines. These can treat or control nausea, vomiting, and pain caused by a bowel obstruction.

#### Considerations for treating a malignant bowel obstruction

If you have a bowel obstruction caused by cancer (also called malignant bowel obstruction), talk to your health care team about available treatments and your goals of care. In most cases, treatments for malignant bowel obstructions relieve symptoms and improve quality of life but may not help you live longer from cancer. You and your family may need to make difficult decisions about your care at this time. If you choose care meant to relieve symptoms over more aggressive treatments, you can learn more about Choices for Care When Treatment May Not Be an Option (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices).

### Talking with your doctor about bowel obstruction

If you think you have a bowel obstruction, contact your doctor right away. They can help you decide on a treatment that is right for you.

Questions to ask your provider about bowel obstruction:

- What is causing the bowel obstruction?
- What treatments are available to me?
- What are possible complications of treatments I may receive for bowel obstruction?
- What foods should I eat or avoid?
- How much liquid should I drink each day?
- What symptoms or problems should I call you about?
- Will I be at risk of future bowel obstructions?

### Getting support if you have a bowel obstruction

Side effects like bowel obstruction can be hard to deal with, both physically and emotionally. It’s important to ask for support from your health care team. They can help you prepare for and make it through difficult times. Learn more about ways to cope with cancer (https://www.cancer.gov/about-cancer/coping), including ways to adjust to daily life during cancer treatment. (https://www.cancer.gov/about-cancer/coping/day-to-day)

For family members and friends who are caring for someone with cancer, you may find these suggestions for caregivers (https://www.cancer.gov/about-cancer/coping/caregiver-support) to be helpful.

#### How a caregiver can help

- Help the person you are caring for eat and drink the foods and liquids their doctor has recommended. Many people treated for a bowel obstruction will need to be on a liquid diet while they recover.
- Provide the person you are caring for with a heating pad for their belly that can help relieve pain and cramping.
- Talk with the person you are caring for about their goals of care, especially if they have a malignant bowel obstruction, to help them decide on a treatment that is right for them.
- Carefully review follow-up care with the person’s doctor to learn what to expect after treatment and how you can help.

### Related Resources

- Coping with Advanced Cancer: Choices for Care Near the End of Life (https://www.cancer.gov/publications/patient-education/advanced-cancer)
- End-of-Life Care for People Who Have Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/care-fact-sheet)
- Palliative Care in Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/palliative-care-fact-sheet)

## What is diarrhea?

Diarrhea means having bowel movements (stools) more often than normal. The stool may also be soft, loose, or watery. Diarrhea is a common side effect of many cancer treatments, such as chemotherapy, immunotherapy, and radiation therapy.

When you have severe diarrhea, your body does not absorb enough water and nutrients. This can lead to serious health problems such as dehydration. Dehydration can be life-threatening, so tell your doctor or nurse if you have diarrhea.

Your doctor will find the diarrhea’s cause and recommend ways to feel better, which may include medicines and food that help decrease or stop diarrhea.

### What causes diarrhea in people with cancer?

Frequent diarrhea may be a sign or symptom of cancer or a side effect of cancer treatment. Causes of diarrhea in people with cancer include:

#### Causes from cancer and cancer treatments

- Certain types of cancer. Diarrhea can be a symptom of some cancers that form in the abdomen or the digestive tract. Cancers that may cause diarrhea include colon cancer, rectal cancer, neuroendocrine tumors in the digestive tract or thyroid, lymphomas that start in the digestive tract, and pancreatic cancer.
- Chemotherapy. Many types of chemo can cause diarrhea because they destroy not only cancer cells but also rapidly dividing healthy cells, including those that line your digestive tract.
- Immunotherapy. Some immunotherapy drugs, especially immune checkpoint inhibitors, can cause inflammation. An inflamed colon (colitis) can lead to diarrhea.
- Radiation therapy. Radiation directed at the abdomen, pelvis, or rectum can cause diarrhea by damaging healthy tissue in the digestive tract. Diarrhea from radiation therapy is a symptom of radiation enteritis.
- Surgery. Having surgery to the esophagus, stomach, gallbladder, or bowel (intestine) can cause diarrhea.
- Targeted therapy. Diarrhea is a common side effect of many targeted therapy drugs.
- Bone marrow or stem cell transplant. Medicines and radiation given during these treatments may cause diarrhea. Diarrhea after bone marrow or stem cell transplant may also be a symptom of graft-versus-host disease.

#### Other causes

- Stress and anxiety. Being diagnosed with cancer and undergoing treatment often leads to stress and anxiety, which are common triggers for diarrhea. Learn about ways to manage stress and anxiety. (https://www.cancer.gov/about-cancer/coping/feelings/relaxation)
- Medicines. Diarrhea can be a side effect of some medicines, including antibiotics and anti-inflammatory drugs. Drugs used to treat diabetes, depression, mood disorders, and heartburn may also cause diarrhea.
- Supplements and herbal products. Some supplements can cause diarrhea. Tell your health care team if you are taking any supplements or herbal products or if you start a new supplement.
- Infections. Infections are a common cause of diarrhea. When being treated for cancer, you are more vulnerable to viral and bacterial infections, including foodborne illness, because treatments such as chemo can weaken your immune system.
- Other conditions. Irritable bowel syndrome, gastroenteritis, fecal impaction, and food allergies can all cause diarrhea.

### Symptoms and grades of diarrhea

Signs and symptoms of diarrhea include:

- having soft, loose, or watery stools
- having bowel movements more often than normal
- feeling an urgent need to have a bowel movement that is difficult to control
- stomach pain or cramps
- excessive gas

People with diarrhea may also:

- have blood or mucus in the stools
- feel dizzy or lightheaded
- have a fever
- experience weight loss

Your doctor will talk with you about your symptoms to figure out the severity, or grade, of your diarrhea. Grade is based on how many bowel movements you have per day, relative to your normal number of bowel movements. Grades 1 and 2 (having up to six bowel movements above your normal daily number) can usually be managed at home, but grades 3 and 4 (having seven or more bowel movements above your normal daily number) can be life-threatening and may require treatment in a hospital.

### How is diarrhea diagnosed in people with cancer?

Finding the cause of diarrhea is important so you can get relief before it interferes with your cancer treatment or causes life-threatening dehydration. Your doctor may ask questions such as:

- How many bowel movements have you had in the past day?
- What was your last bowel movement like (how much, how hard or soft, what color, was there blood or mucus)?
- Have you had any dizziness, fever, or weight loss?
- What are you eating and drinking each day?

Your doctor will do a physical exam and may also use tests and procedures to diagnose the cause of diarrhea and suggest treatment options:

- Stool tests: Tests that check the stool for blood, viruses, bacteria, and other issues that may cause diarrhea.
- Blood tests: These include a complete blood count, electrolyte panel, kidney function test, and albumin test that are used to find the cause of diarrhea and determine its severity.
- Urinalysis: A test to check the color of urine and its contents, such as sugar, protein, red blood cells, and white blood cells.
- Digital rectal exam: A test in which your doctor or nurse inserts a lubricated, gloved finger into the lower part of the rectum to feel for anything that seems unusual.

### Ways to treat and control diarrhea

Treatment of diarrhea in people with cancer depends on its cause and severity (grade). Your doctor may suggest changes to your diet and prescribe medications. You may also receive intravenous (IV) fluids to help replace the fluids you lost. If chemo is causing severe diarrhea, your doctor may reduce your dose or have you stop taking it until your diarrhea gets better.

#### Tips for managing diarrhea

- Drink lots of water or other fluids. Ask your doctor or nurse how much fluid you should drink. Drinking clear liquids (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/clear-liquids), such as water or broth, helps replace fluids and electrolytes your body loses when you have diarrhea. Room temperature liquids are easiest on the stomach.
- Eat small meals. It may help to eat frequent small meals or snacks throughout the day, instead of three larger meals.
- Eat low-fiber foods. Eating foods that are low in fiber (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/low-fiber-foods) can help reduce diarrhea. Foods such as white bread, pasta, and canned fruit are good choices.
- Eat foods that are high in sodium and potassium. You lose these minerals when you have diarrhea, so it’s a good idea to eat foods that help replace them. Peeled and boiled potatoes, soup, bananas, applesauce, and crackers are good options.
- Avoid foods and drinks that can make diarrhea worse. These include alcohol, milk and dairy products, spicy foods, caffeinated drinks, dried beans, foods high in fat, fruit juices, and sugar-free gum or candies. Learn more about how changing your diet can help you manage side effects of cancer treatment at Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition).
- Keep your anal area clean and dry. Try using warm water and baby wipes to stay clean. Taking a sitz bath—a warm, shallow bath—can also be soothing to your anal area.
- Keep a record of your bowel movements. Show this record to your health care team and talk to them about what is normal for you. This can help your doctor treat the diarrhea you are having.

#### Medicines for diarrhea

For severe diarrhea that happens while you are getting cancer treatment, your doctor may recommend medication. Your doctor may prescribe loperamide (Imodium) or a combination of diphenoxylate and atropine (Lomotil) to prevent or treat diarrhea. Doctors may also recommend probiotics that help with digestion and bowel function or fiber supplements (e.g., Metamucil). Check with your doctor before taking these or other medicines and supplements.

#### How a caregiver can help

- Encourage the person you are caring for to drink water or other fluids their doctor suggests. Make sure they have a water bottle they can carry and refill throughout the day.
- Keep a record of the person’s bowel movements. Ask the health care team about when you should call them if the diarrhea lasts or becomes more severe.
- Try to keep the person’s pantry stocked with foods that can help relieve diarrhea.
- Encourage the person to take warm, shallow baths to relieve pain and irritation from diarrhea.

### Talking with your doctor about diarrhea

Tell your doctor or nurse if you are having diarrhea. They can help you find ways to prevent and control this side effect of cancer and cancer treatment.

Questions to ask your provider about diarrhea:

- What symptoms or problems should I call you about?
- What medicines can I take for diarrhea?
- What can help decrease rectal pain and irritation?
- How much and what types of liquid should I drink each day?
- What foods should I eat while I have diarrhea? What foods should I avoid?
- Could I meet with a registered dietitian to learn more?

### Getting support if you have diarrhea

Side effects like diarrhea can be hard to deal with, both physically and emotionally. It’s important to ask for support from your health care team. They can help you prepare for and make it through difficult times. Learn more about ways to cope with cancer (https://www.cancer.gov/about-cancer/coping), including ways to adjust to daily life during cancer treatment (https://www.cancer.gov/about-cancer/coping/day-to-day).

For family members and friends who are caring for someone with cancer, you may find these suggestions for caregivers to be helpful (https://www.cancer.gov/about-cancer/coping/caregiver-support).

Listen to tips on how to manage diarrhea caused by your cancer treatments such as radiation therapy (https://www.cancer.gov/about-cancer/treatment/side-effects/diarrhea/radiationtherapy-07-diarrhea.mp3). (Type: MP3 | Time: 2:55 | Size: 2.7MB)

### Related Resources

- Gastrointestinal Complications (PDQ®)–Health Professional Version (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation/gi-complications-hp-pdq)
- Eating Hints: Before, During, and After Cancer Treatment (https://www.cancer.gov/publications/patient-education/eating-hints)